# Delirium (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the causes and treatment of delirium. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## General Information About Delirium

Key Points for This Section
- Delirium is a confused mental state that can occur in patients who have cancer.
- Delirium may come and go during the day.

### Delirium is a confused mental state that can occur in patients who have cancer.

Delirium is a confused mental state that can occur in patients who have cancer, especially advanced cancer. Patients with delirium have problems with the following:

- Attention.
- Thinking.
- Awareness.
- Behavior.
- Emotions.
- Judgement.
- Memory.
- Muscle control.
- Sleeping and waking.

There are three types of delirium:

- Hypoactive: The patient is not active and seems sleepy, tired, or depressed.
- Hyperactive: The patient is restless or agitated.
- Mixed: The patient changes back and forth between being hypoactive and hyperactive.

### Delirium may come and go during the day.

The symptoms of delirium usually occur suddenly. They often occur within hours or days and may come and go. Delirium is often temporary and can be treated. However, in the last 24 to 48 hours of life, delirium may be permanent because of problems like organ failure. Most advanced cancer patients have delirium that occurs in the last hours to days before death.

This summary is about delirium in adults.

## Causes of Delirium

Key Points for This Section
- Delirium may be caused by cancer, cancer treatment, or other medical conditions.
- It is important to know the risk factors for delirium.

### Delirium may be caused by cancer, cancer treatment, or other medical conditions.

There is often more than one cause of delirium in a cancer patient, especially when the cancer is advanced and the patient has many medical conditions. Causes of delirium include the following:

- Organ failure, such as liver or kidney failure.
- Electrolyte imbalances: Electrolytes are important minerals (including salt, potassium, calcium, and phosphorous) in blood and body fluids. These electrolytes are needed to keep the heart, kidneys, nerves, and muscles working the way they should.
- Infections.
- Paraneoplastic syndromes: Symptoms that occur when cancer-fighting antibodies or white blood cells attack normal cells in the nervous system by mistake.
- Side effects of medicines and treatments: Patients with cancer may take medicines with side effects that include delirium and confusion. The effects usually go away after the medicine is stopped.
- Withdrawal from medicines that depress (slow down) the central nervous system (brain and spinal cord).

### It is important to know the risk factors for delirium.

Patients with cancer are likely to have more than one risk factor for delirium. Identifying risk factors early may help prevent delirium or decrease the time it takes to treat it. Risk factors include the following:

- Serious illness.
- Having more than one disease.
- Older age.
- Dementia.
- Low level of albumin (protein) in the blood, which is often caused by liver problems.
- Infection.
- High level of nitrogen waste products in the blood, which is often caused by kidney problems.
- Taking medicines that affect the mind or behavior.
- Taking high doses of pain medicines, such as opioids.

The risk increases when the patient has more than one risk factor. Older patients with advanced cancer who are hospitalized often have more than one risk factor for delirium.

## Effects of Delirium on the Patient, Family, and Health Care Providers

Key Points for This Section
- Delirium causes changes in the patient that can upset the family and caregivers.
- Delirium may affect physical health and communication.

### Delirium causes changes in the patient that can upset the family and caregivers.

Delirium may be dangerous to the patient if his or her judgment is affected. Delirium can cause the patient to behave in unusual ways. Even a quiet or calm patient can have a sudden change in mood or become agitated and need more care.

Delirium can be upsetting to the family and caregivers. When the patient becomes agitated, family members often think the patient is in pain, but this may not be the case. Learning about differences between the symptoms of delirium and pain may help the family and caregivers understand how much pain medicine is needed. Health care providers can help the family and caregivers learn about these differences.

### Delirium may affect physical health and communication.

Patients with delirium are:

- More likely to fall.
- Sometimes unable to control bladder and/or bowels.
- More likely to become dehydrated (drink too little water to stay healthy).

They often need a longer hospital stay than patients without delirium.

The confused mental state of these patients may make them:

- Unable to talk with family members and caregivers about their needs and feelings.
- Unable to make decisions about care.

This makes it harder for health care providers to assess the patient's symptoms. The family may need to make decisions for the patient.

## Diagnosing Delirium

Key Points for This Section
- Possible signs of delirium include sudden personality changes, problems thinking, and unusual anxiety or depression.
- The symptoms of delirium are a lot like symptoms of depression and dementia.
- Physical exams and other laboratory tests are used to diagnose the causes of delirium.

### Possible signs of delirium include sudden personality changes, problems thinking, and unusual anxiety or depression.

When the following symptoms occur suddenly, they may be signs of delirium:

- Agitation.
- Not cooperating.
- Changes in personality or behavior.
- Problems thinking.
- Problems paying attention.
- Unusual anxiety or depression.

### The symptoms of delirium are a lot like symptoms of depression and dementia.

Early symptoms of delirium are like symptoms of depression and dementia. Delirium that causes the patient to be inactive may appear to be depression. Delirium and dementia both cause problems with memory, thinking, and judgment. Dementia may be caused by a number of medical conditions, including Alzheimer disease. Differences in the symptoms of delirium and dementia include the following:

- Patients with delirium often show changes in how alert or aware they are. Patients who have dementia usually stay alert and aware until the dementia becomes very advanced.
- Delirium occurs suddenly (within hours or days). Dementia appears gradually (over months to years) and gets worse over time.

Older patients with cancer may have both dementia and delirium. This can make it hard for the doctor to diagnose the problem. If treatment for delirium is given and the symptoms continue, then the diagnosis is more likely dementia. Checking the patient's health and symptoms over time can help diagnose delirium and dementia.

### Physical exams and other laboratory tests are used to diagnose the causes of delirium.

Doctors will try to find the causes of delirium.

- Physical exam and history: An exam of the body to check general signs of health, including checking for signs of disease, such as lumps or anything else that seems unusual. A history of the patient's health habits, past illnesses including depression, and treatments will also be taken. A physical exam can help rule out a physical condition that may be causing symptoms.
- Laboratory tests: Medical procedures that test samples of tissue, blood, urine, or other substances in the body. These tests help to diagnose disease, plan and check treatment, or monitor the disease over time.

## Treatment of Delirium

Key Points for This Section
- Treatment includes looking at the causes and symptoms of delirium.
- Treatment without medicines can also help relieve symptoms.
- Treatment may include medicines.
- Sedation may be used for delirium at the end of life or when delirium does not get better with treatment.

### Treatment includes looking at the causes and symptoms of delirium.

Both the causes and the symptoms of delirium may be treated. Treatment depends on the following:

- Where the patient is living, such as home, hospital, or nursing home.
- How advanced the cancer is.
- How the delirium symptoms are affecting the patient.
- The wishes of the patient and family.

Treating the causes of delirium usually includes the following:

- Stopping or lowering the dose of medicines that cause delirium.
- Giving fluids to treat dehydration.
- Giving drugs to treat hypercalcemia (too much calcium in the blood).
- Giving antibiotics for infections.

In a terminally ill patient with delirium, the doctor may treat just the symptoms. The doctor will continue to watch the patient closely during treatment.

### Treatment without medicines can also help relieve symptoms.

Controlling the patient's surroundings may help with mild symptoms of delirium. The following may help:

- Keep the patient's room quiet and well-lit, and put familiar objects in it.
- Put a clock or calendar where the patient can see it.
- Have family members around.
- Keep the same caregivers as much as possible.

Patients who may hurt themselves or others may need to have physical restraints.

### Treatment may include medicines.

Medicines may be used to treat the symptoms of delirium depending on the patient's condition and heart health. These medicines have serious side effects and the patient will be watched closely by a doctor. These medicines include the following:

- Haloperidol.
- Olanzapine.
- Risperidone.
- Lorazepam.
- Midazolam.

### Sedation may be used for delirium at the end of life or when delirium does not get better with treatment.

When the symptoms of delirium are not relieved with standard treatments and the patient is near death, in pain, or has trouble breathing, other treatment may be needed. Sometimes medicines that will sedate (calm) the patient will be used. The family and the health care team will make this decision together.

The decision to use sedation for delirium may be guided by the following:

- The patient will have repeated assessments by experts before the delirium is considered to be refractory (doesn't respond to treatment).
- The decision to sedate the patient is reviewed by a team of health care professionals and not made by one doctor.
- Temporary sedation, for short periods of time such as overnight, is considered before continuous sedation is used.
- The team of health care professionals will work with the family to make sure the team understands the family's views and that the family understands palliative sedation.

## Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/about-cancer/treatment/clinical-trials/search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/about-cancer/treatment/clinical-trials/) about clinical trials is also available.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the causes and treatment of delirium. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/about-cancer/treatment/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Delirium. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/memory/delirium-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389165]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).